# Endometrial Cancer Prevention (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about endometrial cancer prevention. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Who Is at Risk?

Endometrial cancer occurs in postmenopausal women, with an average age at diagnosis of 60 years. Estrogen, both endogenous and exogenous, is associated with endometrial proliferation, hyperplasia, and cancer. Thus, risk factors include endometrial hyperplasia, reproductive factors (nulliparity, early menarche and late menopause), polycystic ovary syndrome, postmenopausal estrogen therapy, obesity with adult weight gain, and tamoxifen use. Women with Lynch syndrome have an increased risk of endometrial cancer, as do women who have a first-degree relative with endometrial cancer.

## Overview

Note: The Overview section summarizes the published evidence on this topic. The rest of the summary describes the evidence in more detail.

Other PDQ summaries with information related to endometrial cancer prevention include the following:

- Endometrial Cancer Screening
- Endometrial Cancer Treatment
- Genetics of Breast and Gynecologic Cancers
- Uterine Sarcoma Treatment

### Factors With Adequate Evidence for an Increased Risk of Endometrial Cancer

#### Endometrial hyperplasia

Based on solid evidence, endometrial hyperplasia is associated with concurrent [1] or subsequent development of cancer, an association first recognized in 1932.[2]

Magnitude of Effect: Women with hyperplasia and atypia have a 40% risk of concurrent cancer.[3]

- Study Design: Prospective cohort series.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Hormone therapy (HT) with estrogen: Unopposed estrogen

Based on solid evidence, unopposed estrogen is associated with an increased risk of endometrial cancer. This excess risk can be eliminated by adding continuous progestin to estrogen therapy, but this combination is associated with an increased risk of breast cancer.[4-7] For more information, see Breast Cancer Prevention.

Magnitude of Effect: The associated risk of endometrial cancer in women who use unopposed estrogen for 5 or more years is at least twofold higher than in women who do not use the hormone. The risk increases with prolonged use of unopposed estrogen.

- Study Design: Randomized controlled trials, cohort, and case-control studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Selective estrogen receptor modulators (SERMs)

Based on solid evidence, more than 2 years of tamoxifen use is associated with an increased risk of endometrial cancer.[8] The use of a similar SERM, raloxifene, is not associated with an increased risk.[9,10]

Magnitude of Effect: Women taking tamoxifen for more than 2 years have a 2.3-fold to 7.5-fold relative risk (RR) of endometrial cancer, including an increased risk of uterine serous carcinoma and carcinosarcoma.[11]

- Study Design: Multiple randomized controlled trials.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Obesity

Based on solid evidence, being overweight or having obesity, and adult weight gain are associated with an increased risk of endometrial cancer.[12]

Magnitude of Effect: The risk of endometrial cancer increases 1.5-fold per 5 kg/m^2^ change in body mass.[12]

- Study Design: Multiple randomized controlled trials.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Genetic predisposition

Based on solid evidence, women with certain inherited conditions, with highly penetrant genes, and with a family history of endometrial cancer in a first-degree relative have an increased risk of developing endometrial cancer.

Magnitude of Effect: The risk of developing endometrial cancer increased by 1.82-fold (95% confidence interval [CI], 1.65–1.98) and was associated with a history of endometrial cancer in a first-degree relative. The absolute risk of endometrial cancer among women with BRCA1 or BRCA2 variants was 3%.

- Study Design: Case controls, cohort studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

### Factors With Adequate Evidence for a Decreased Risk of Endometrial Cancer

#### Pregnancy and lactation

Based on solid evidence, increased parity and duration of lactation are associated with a decreased risk of endometrial cancer.[13]

Magnitude of Effect: Parous women have a 35% decreased risk of endometrial cancer (hazard ratio [HR], 0.65; 95% CI, 0.54–0.77) compared with nulliparous women. Duration of breastfeeding has also been associated with a decreased risk, with a 23% risk reduction noted for women who breastfeed longer than 18 months. The risk reduction was attenuated when adjusted for parity.[14,15]

- Study Design: Prospective cohort study, case-control studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Hormonal contraceptives: Benefits

Based on solid evidence, at least 1-year use of oral contraceptives containing estrogen and progesterone decreases endometrial cancer risk, proportionate to duration of use.[16] The lower risk may persist for more than 30 years after the last use of oral contraceptives.[16,17]

- Study Design: Case-control studies and cohort studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

Magnitude of Effect: Use of oral contraceptives for 5 years was associated with an RR reduction of 24% (risk ratio, 0.76; 95% CI, 0.73–0.78) and persisted for more than 30 years. Ten years of use was associated with an absolute reduction in risk before age 75 years from 2.3 per 100 women to 1.3 per 100 women.

#### Hormonal contraceptives: Harms

Based on solid evidence, current use of combined oral contraceptives is associated with an increased risk of blood clots,[18] stroke, and myocardial infarction,[19] especially among women who smoke cigarettes and who are older than 35 years.

Magnitude of Effect: Use of oral contraceptives was associated with an absolute increased risk of blood clots of approximately 1 case per 4,465 person-years (95% CI, 4,095–4,797 person-years). Use of oral contraceptives was associated with an increased RR of stroke or myocardial infarction of 60% (risk ratio, 1.6; 95% CI, 1.3–1.9).

- Study Design: Cohort studies, nested case-control studies, case-control studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Weight loss: Benefits

The evidence is insufficient to conclude whether weight loss is associated with a decreased incidence of endometrial cancer. Based on one study, self-reported intentional weight loss during three age periods was not associated with a decrease in endometrial cancer incidence.[20] Bariatric surgery is associated with a decreased risk of developing endometrial cancer.[21-23] After bariatric surgery, other obesity-related health conditions, such as diabetes and metabolic syndrome are also often improved or resolved.

Magnitude of Effect: RR of endometrial cancer for women who intentionally lost at least 20 pounds was 0.93 (95% CI, 0.6–1.44). The incidence rate of endometrial cancer per 1,000 person-years was 1.1 in those who underwent bariatric surgery compared with 2 in the control group of patients with obesity who received usual care (HR, 0.56; 95% CI, 0.35–0.89).

- Study Design: Prospective and retrospective cohort studies.
- Internal Validity: Good.
- Consistency: Fair.
- External Validity: Good.

#### Weight loss: Harms

A variety of procedures are included under the umbrella of bariatric surgery. Bariatric surgery is associated with a potential for short-term surgical complications, and possible medium and long-term risks. Immediate surgical complications may include infections, venous thromboembolism, respiratory or cardiac complications, anastomotic leak, marginal ulcers, stenosis or obstruction, or rarely, death.[24,25] Dumping syndrome and metabolic and nutritional derangements from malabsorption may also occur.[26]

#### Physical activity: Benefits

Based on solid evidence, increased physical exercise is associated with a decreased risk of endometrial cancer.[27 ,28]

Magnitude of Effect: Regular exercise may be associated with a 38% to 46% relative decrease in risk. However, a trend in risk reduction with increasing exercise duration or intensity has not been shown.

- Study Design: Multiple cohort and case-control studies.
- Internal Validity: Good.
- Consistency: Fair.
- External Validity: Good.

#### Smoking: Benefits

Based on solid evidence, cigarette smoking is associated with a decreased risk of endometrial cancer.[29]

Magnitude of Effect: Smokers have a reduced risk of endometrial cancer of approximately 20% among prospective studies (RR, 0.81; 95% CI, 0.74–0.88) and case-control studies (odds ratio, 0.72; 95% CI, 0.66–0.79).[29]

- Study Design: Prospective cohort and case-control studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Smoking: Harms

Based on solid evidence, cigarette smoking is associated with cardiovascular disease and cancers of the head and neck, lung, bladder, and pancreas. Cigarette smokers have a decreased life expectancy; they live at least 10 fewer years than nonsmokers.[30]

### Intervention With Inadequate Evidence of an Association With Endometrial Cancer

#### Fruits, vegetables, and vitamins

There is adequate evidence of no association between endometrial cancer and diet or vitamin intake.[31-35]

- Study Design: Cohort and case-control studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Hair products, including dyes, bleach, highlights, straighteners, and permanents

There is insufficient evidence of an association between hair products and endometrial cancer. One retrospective analysis of the Sister Study addressed a possible association between these hair products and uterine cancers, including endometrial cancers.[36]

- Study Design: Cohort.
- Internal Validity: Poor.
- Consistency: No other studies at this time.
- External Validity: Poor.

### References

Widra EA, Dunton CJ, McHugh M, et al.: Endometrial hyperplasia and the risk of carcinoma. Int J Gynecol Cancer 5 (3): 233-235, 1995.11578482
Taylor HC: Endometrial hyperplasia and carcinoma of the body of the uterus. Am J Obstet Gynecol 23 (3): 309-32, 1932.
Trimble CL, Kauderer J, Zaino R, et al.: Concurrent endometrial carcinoma in women with a biopsy diagnosis of atypical endometrial hyperplasia: a Gynecologic Oncology Group study. Cancer 106 (4): 812-9, 2006.16400639
Beral V, Bull D, Reeves G, et al.: Endometrial cancer and hormone-replacement therapy in the Million Women Study. Lancet 365 (9470): 1543-51, 2005 Apr 30-May 6.15866308
Anderson GL, Limacher M, Assaf AR, et al.: Effects of conjugated equine estrogen in postmenopausal women with hysterectomy: the Women's Health Initiative randomized controlled trial. JAMA 291 (14): 1701-12, 2004.15082697
Furness S, Roberts H, Marjoribanks J, et al.: Hormone therapy in postmenopausal women and risk of endometrial hyperplasia. Cochrane Database Syst Rev (2): CD000402, 2009.19370558
Grady D, Gebretsadik T, Kerlikowske K, et al.: Hormone replacement therapy and endometrial cancer risk: a meta-analysis. Obstet Gynecol 85 (2): 304-13, 1995.7824251
Fisher B, Costantino JP, Redmond CK, et al.: Endometrial cancer in tamoxifen-treated breast cancer patients: findings from the National Surgical Adjuvant Breast and Bowel Project (NSABP) B-14. J Natl Cancer Inst 86 (7): 527-37, 1994.8133536 94180408
Cummings SR, Eckert S, Krueger KA, et al.: The effect of raloxifene on risk of breast cancer in postmenopausal women: results from the MORE randomized trial. Multiple Outcomes of Raloxifene Evaluation. JAMA 281 (23): 2189-97, 1999.10376571 99303064
DeMichele A, Troxel AB, Berlin JA, et al.: Impact of raloxifene or tamoxifen use on endometrial cancer risk: a population-based case-control study. J Clin Oncol 26 (25): 4151-9, 2008.18757329
Brinton LA, Felix AS, McMeekin DS, et al.: Etiologic heterogeneity in endometrial cancer: evidence from a Gynecologic Oncology Group trial. Gynecol Oncol 129 (2): 277-84, 2013.23485770
Aune D, Navarro Rosenblatt DA, Chan DS, et al.: Anthropometric factors and endometrial cancer risk: a systematic review and dose-response meta-analysis of prospective studies. Ann Oncol 26 (8): 1635-48, 2015.25791635
Newcomb PA, Trentham-Dietz A: Breast feeding practices in relation to endometrial cancer risk, USA. Cancer Causes Control 11 (7): 663-7, 2000.10977111 20431623
Dossus L, Allen N, Kaaks R, et al.: Reproductive risk factors and endometrial cancer: the European Prospective Investigation into Cancer and Nutrition. Int J Cancer 127 (2): 442-51, 2010.19924816
Karageorgi S, Hankinson SE, Kraft P, et al.: Reproductive factors and postmenopausal hormone use in relation to endometrial cancer risk in the Nurses' Health Study cohort 1976-2004. Int J Cancer 126 (1): 208-16, 2010.19551854
Collaborative Group on Epidemiological Studies on Endometrial Cancer: Endometrial cancer and oral contraceptives: an individual participant meta-analysis of 27 276 women with endometrial cancer from 36 epidemiological studies. Lancet Oncol 16 (9): 1061-70, 2015.26254030
Iversen L, Sivasubramaniam S, Lee AJ, et al.: Lifetime cancer risk and combined oral contraceptives: the Royal College of General Practitioners' Oral Contraception Study. Am J Obstet Gynecol 216 (6): 580.e1-580.e9, 2017.28188769
de Bastos M, Stegeman BH, Rosendaal FR, et al.: Combined oral contraceptives: venous thrombosis. Cochrane Database Syst Rev (3): CD010813, 2014.24590565
Roach RE, Helmerhorst FM, Lijfering WM, et al.: Combined oral contraceptives: the risk of myocardial infarction and ischemic stroke. Cochrane Database Syst Rev (8): CD011054, 2015.26310586
Parker ED, Folsom AR: Intentional weight loss and incidence of obesity-related cancers: the Iowa Women's Health Study. Int J Obes Relat Metab Disord 27 (12): 1447-52, 2003.14634673
Anveden Å, Taube M, Peltonen M, et al.: Long-term incidence of female-specific cancer after bariatric surgery or usual care in the Swedish Obese Subjects Study. Gynecol Oncol 145 (2): 224-229, 2017.28259424
Schauer DP, Feigelson HS, Koebnick C, et al.: Bariatric Surgery and the Risk of Cancer in a Large Multisite Cohort. Ann Surg 269 (1): 95-101, 2019.28938270
Aminian A, Wilson R, Al-Kurd A, et al.: Association of Bariatric Surgery With Cancer Risk and Mortality in Adults With Obesity. JAMA 327 (24): 2423-2433, 2022.35657620
Flum DR, Belle SH, King WC, et al.: Perioperative safety in the longitudinal assessment of bariatric surgery. N Engl J Med 361 (5): 445-54, 2009.19641201
Sanyal AJ, Sugerman HJ, Kellum JM, et al.: Stomal complications of gastric bypass: incidence and outcome of therapy. Am J Gastroenterol 87 (9): 1165-9, 1992.1519574
van Beek AP, Emous M, Laville M, et al.: Dumping syndrome after esophageal, gastric or bariatric surgery: pathophysiology, diagnosis, and management. Obes Rev 18 (1): 68-85, 2017.27749997
Moradi T, Weiderpass E, Signorello LB, et al.: Physical activity and postmenopausal endometrial cancer risk (Sweden). Cancer Causes Control 11 (9): 829-37, 2000.11075872 20525130
Schouten LJ, Goldbohm RA, van den Brandt PA: Anthropometry, physical activity, and endometrial cancer risk: results from the Netherlands Cohort Study. J Natl Cancer Inst 96 (21): 1635-8, 2004.15523093
Zhou B, Yang L, Sun Q, et al.: Cigarette smoking and the risk of endometrial cancer: a meta-analysis. Am J Med 121 (6): 501-508.e3, 2008.18501231
Centers for Disease Control and Prevention: Smoking and Tobacco Use. Atlanta, Ga: Centers for Disease Control and Prevention, Office on Smoking and Health, 2015. Available Online (https://www.cdc.gov/tobacco/data_statistics/fact_sheets/fast_facts/index.htm). Last accessed December 18, 2023.
International Agency for Research On Cancer: IARC Handbooks of Cancer Prevention. Volume 8: Fruit and Vegetables. International Agency for Research On Cancer, 2003.
Bandera EV, Kushi LH, Gifkins DM, et al.: WCRF Systematic Literature Review: The Association Between Food, Nutrition, and Physical Activity and the Risk of Endometrial Cancer and Underlying Mechanisms. World Cancer Research Fund, American Institute for Cancer Research, 2006.
Horn-Ross PL, John EM, Canchola AJ, et al.: Phytoestrogen intake and endometrial cancer risk. J Natl Cancer Inst 95 (15): 1158-64, 2003.12902445
Xu WH, Zheng W, Xiang YB, et al.: Soya food intake and risk of endometrial cancer among Chinese women in Shanghai: population based case-control study. BMJ 328 (7451): 1285, 2004.15136343
Zeleniuch-Jacquotte A, Gallicchio L, Hartmuller V, et al.: Circulating 25-hydroxyvitamin D and risk of endometrial cancer: Cohort Consortium Vitamin D Pooling Project of Rarer Cancers. Am J Epidemiol 172 (1): 36-46, 2010.20562189
Chang CJ, O'Brien KM, Keil AP, et al.: Use of Straighteners and Other Hair Products and Incident Uterine Cancer. J Natl Cancer Inst 114 (12): 1636-1645, 2022.36245087

## Incidence and Mortality

Endometrial cancer is the most common invasive gynecologic cancer in U.S. women, with an estimated 69,120 new cases expected to occur in 2025.[1] This disease primarily affects postmenopausal women at an average age of 60 years at diagnosis.[2] In the United States, it is estimated that approximately 13,860 women will die of endometrial cancer in 2025. Over the past decade, incidence rates of endometrial cancer increased by 0.6% per year in White women and by 2% to 3% per year in women of all other racial and ethnic groups. Between 2013 and 2022, death rates for endometrial cancer increased by 1.5% per year.[1] Higher mortality from endometrial cancer in African American women compared with White women is only partly attributable to lower socioeconomic issues that impair access to care.[3,4]

Compared with the incidence in White American women, endometrial cancer incidence is lower in Japanese American (relative risk [RR], 0.6; 95% confidence interval [CI], 0.46–0.83) and Latina American women (RR, 0.63; 95% CI, 0.46–0.87), but not in African American (RR, 0.76; 95% CI, 0.53–1.08) or native Hawaiian women (RR, 0.92; 95% CI, 0.58–1.46).[5] When corrected for hysterectomy prevalence among U.S. women, the incidence of all histological subtypes of endometrial cancer has increased approximately 2% per year between 2000 and 2015 among non-Hispanic Black, non-Hispanic Asian or Pacific Islander, and Hispanic women, but has remained stable among non-Hispanic White women.[6] The incidence of endometrioid endometrial cancer has increased 1% to 2% among all racial and ethnic subgroups except non-Hispanic White women, where it has also remained stable across the same period. The greatest increase in incidence across all racial and ethnic subgroups has been seen in nonendometrioid histological subtypes, with an approximate 2% increase in non-Hispanic White women, 3% increase in non-Hispanic Black women, and 4% increase in non-Hispanic Asian or Pacific Islanders and Hispanic women. These findings challenge the supposition that the increase in endometrial cancer incidence was caused by the obesity epidemic, which would have been expected to increase the incidence of the endometrioid subtype more than the nonendometrioid subtypes.[6]

Endometrial cancer risk is associated with endogenous and exogenous factors associated with estrogen effects.[7-9] Thus, risk factors for endometrial cancer include reproductive factors such as nulliparity, early menarche, and late menopause, as well as obesity with adult weight gain, polycystic ovary syndrome, postmenopausal estrogen use, and tamoxifen use.

Women with Lynch syndrome have a lifetime risk of endometrial cancer of up to 60%.[10] For additional information about inherited risk, see Genetics of Breast and Gynecologic Cancers.

### References

American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
American Cancer Society: Detailed Guide: Endometrial Cancer: What are the Risk Factors for Endometrial Cancer? Atlanta, Ga: American Cancer Society, 2005. Available online (https://www.cancer.org/cancer/endometrial-cancer.html). Last accessed April 8, 2025.
Madison T, Schottenfeld D, James SA, et al.: Endometrial cancer: socioeconomic status and racial/ethnic differences in stage at diagnosis, treatment, and survival. Am J Public Health 94 (12): 2104-11, 2004.15569961
Long B, Liu FW, Bristow RE: Disparities in uterine cancer epidemiology, treatment, and survival among African Americans in the United States. Gynecol Oncol 130 (3): 652-9, 2013.23707671
Setiawan VW, Pike MC, Kolonel LN, et al.: Racial/ethnic differences in endometrial cancer risk: the multiethnic cohort study. Am J Epidemiol 165 (3): 262-70, 2007.17090617
Clarke MA, Devesa SS, Harvey SV, et al.: Hysterectomy-Corrected Uterine Corpus Cancer Incidence Trends and Differences in Relative Survival Reveal Racial Disparities and Rising Rates of Nonendometrioid Cancers. J Clin Oncol 37 (22): 1895-1908, 2019.31116674
Zeleniuch-Jacquotte A, Akhmedkhanov A, Kato I, et al.: Postmenopausal endogenous oestrogens and risk of endometrial cancer: results of a prospective study. Br J Cancer 84 (7): 975-81, 2001.11286480 21184087
Lukanova A, Lundin E, Micheli A, et al.: Circulating levels of sex steroid hormones and risk of endometrial cancer in postmenopausal women. Int J Cancer 108 (3): 425-32, 2004.14648710
Brown SB, Hankinson SE: Endogenous estrogens and the risk of breast, endometrial, and ovarian cancers. Steroids 99 (Pt A): 8-10, 2015.25555473
Watson P, Vasen HF, Mecklin JP, et al.: The risk of endometrial cancer in hereditary nonpolyposis colorectal cancer. Am J Med 96 (6): 516-20, 1994.8017449 94288076

## Factors With Adequate Evidence for an Increased Risk of Endometrial Cancer

### Endogenous Hyperplasia

Reproductive factors resulting in increased duration of exposure to endogenous estrogen, such as early menarche, nulliparity, and late menopause, are associated with an increased risk of endometrial cancer. Early menarche when compared with late menarche has been associated with a 39% relative increased risk of endometrial cancer among participants in the European Prospective Investigation into Cancer and Nutrition.[1] In the same study, late menopause and nulliparity were associated with a 2.2-fold and 1.6-fold increased risk, respectively. Other factors associated with increased risk, such as obesity and polycystic ovary syndrome, may also be related to increased estrogen exposure.[2] Polycystic ovary syndrome has been associated with a threefold increased risk of endometrial cancer in a meta-analysis.[3]

### Hormone Therapy (HT) With Estrogen: Unopposed Estrogen

An association between postmenopausal estrogen replacement therapy and endometrial cancer was reported in 1975 [4] and confirmed soon after.[5,6] In these three studies, the overall risk ratio ranged from 4.5 to 8.0. Further studies documented an association with duration of use (10-fold to 30-fold with 5 years or more of use),[7-10] and a persistent effect lasting more than 10 years after 1 year of use.[11] When these findings were publicized, prescriptions for estrogen declined sharply, followed rapidly by a drop in endometrial cancer incidence.[12]

Postmenopausal estrogen was long recognized to be associated with the risk of endometrial hyperplasia, often a precursor of endometrial cancer.[13] In addition, progestational agents were known to be effective in the treatment of uterine neoplasms.[14-16] Consequently, combined estrogen-progesterone postmenopausal hormone therapy (HT) avoids the endometrial cancer risk associated with unopposed estrogen and actually reduces the risk by 35%.[17] Tibolone, a synthetic steroid with estrogenic, progestogenic, and androgenic properties, has been associated with an increased incidence rate ratio of endometrial cancer of 3.56 (95% confidence interval [CI], 3.08–4.69) for current users compared with never-users. Tibolone is approved for use to manage menopausal symptoms or to prevent osteoporosis in many countries. However, it is not approved for use in Canada or the United States. Other combined therapy with estrogen and progestin may also increase the risk of breast cancer, so the risks and benefits must be considered.[18,19] The Women’s Health Initiative (WHI) study was a randomized trial that compared combination estrogen and progestin therapy with no hormone replacement. The absolute excess risk of breast cancer attributable to estrogen/progestin use was 8 more invasive breast cancers per 10,000 person-years.[19]

### Selective Estrogen Receptor Modulators (SERMs)

Tamoxifen and raloxifene are SERMs, drugs that have divergent estrogen agonist and antagonist effects in different target organs. The association between endometrial cancer and tamoxifen was first recognized in 1985 when three cases of endometrial cancer were described in women who had been treated with tamoxifen for breast cancer.[20] Since then, confirmation of the association has been provided by randomized clinical trials using tamoxifen for breast cancer treatment and prevention [21-24] and by case-control, observational, and laboratory studies.

The National Surgical Adjuvant Breast and Bowel Project, Breast Cancer Prevention Trial P-1 Study in women at high risk of invasive breast cancer demonstrated that tamoxifen decreased breast cancer incidence by 49% but confirmed an increased incidence of endometrial cancer. The annual rate was 2.2 cases per 1,000 women for those who received tamoxifen versus 0.68 cases per 1,000 women for those who received placebo. Significantly increased risks were restricted to women aged 50 years or older at study entry. Of the 53 invasive cancers associated with tamoxifen use, 52 were stage I.[25] Tamoxifen use has also been shown to be associated with high-risk histological subtypes, with an odds ratio (OR) of 3.2 for uterine serous carcinoma and 5.4 for uterine carcinosarcoma; however, the absolute risk of these rare histological subtypes remains low.[26]

Raloxifene is a second-generation SERM approved for prophylaxis against postmenopausal osteoporosis. Unlike tamoxifen, it does not have an estrogenic effect on the uterus. The Multiple Outcomes of Raloxifene randomized trial, after 40 months of follow-up, showed that raloxifene reduced the risk of estrogen receptor–positive breast cancer, without increasing endometrial cancer (relative risk [RR], 0.8; 95% CI, 0.2–2.7).[27] A population-based case-control study included 547 women with endometrial cancer and 1,410 controls. The study reported a reduction in risk of endometrial cancer with raloxifene use (OR, 0.50; 95% CI, 0.29–0.85) and confirmed an increased risk associated with tamoxifen use.[28]

### Obesity

Elevated body mass index (BMI), obesity, and weight gain are associated with an increased risk of endometrial cancer. One of the possible mechanisms for the observed association is an increased level of serum estrone in women with obesity as a result of aromatization of androstenedione in adipose tissue, which increases the production of estrogen.[29] Alternatively, obesity has been associated with a reduction in levels of sex hormone-binding globulin (SHBG), which may protect against endometrial cancer by decreasing bioavailable estrogen.[30] Obesity has been associated with several factors known to increase the risk of endometrial cancer, including upper-body or central adiposity, polycystic ovary syndrome, and physical inactivity.[31,32]

Body weight is a modifiable risk factor, which accounts for a substantial proportion of endometrial cases worldwide. A study conducted among European countries estimated that between 26% and 47% of endometrial cancer cases can be attributed to overweight and obesity. The same group conducted a meta-analysis of 12 studies (5 cohort and 7 case-control), which examined the relationship between obesity and endometrial cancer. Eleven of the 12 studies concluded that there is a positive association between endometrial cancer and excess weight.[33]

RRs associated with obesity range from 2 to 10. Some studies show that upper-body and central weight confer a higher risk than peripheral body weight, even after consideration of BMI.[34-36] However, other studies have failed to confirm such an association. Several studies have observed a stronger association between endometrial cancer and obesity near the time of diagnosis compared with obesity earlier in life.[37-40] An increased risk is observed across all measures of adiposity, such as BMI, waist circumference, waist-to-hip ratio, and weight gain.[41]

A meta-analysis of prospective studies observed an RR of 1.39 (95% CI, 1.29–1.49) among nonusers and 1.09 (95% CI, 1.02–1.16) among HT users for each 5 kg increase in adult weight gain.[42] Another meta-analysis also observed a stronger association between BMI and the risk of endometrial cancer in never-users of HT than in ever-users of HT.[43]

A meta-analysis examined the association between metabolic syndrome and endometrial cancer risk. The study observed an increased risk associated with metabolic syndrome (RR, 1.89; 95% CI, 1.34–2.67) and with each component of the syndrome (BMI and/or waist circumference, blood pressure, and triglyceride levels), except low high-density lipoprotein cholesterol.[44] In a meta-analysis of studies of the association between diabetes and cancer, endometrial cancer was associated with a hazard ratio (HR) of approximately 2.[45] However, data from the WHI suggest that the association between diabetes and endometrial cancer is largely mediated through the risk of obesity.[46]

### Genetic Predisposition

Women with inherited conditions such as Lynch syndrome, Cowden syndrome, and polycystic ovary syndrome have an increased risk of endometrial cancer. For more information, see Genetics of Breast and Gynecologic Cancers and Genetics of Colorectal Cancer. However, in addition to inherited syndromes with highly penetrant genes (including BRCA1 and BRCA2), having a family history of endometrial cancer in a first-degree relative also is associated with an increased risk of cancer.[47] A meta-analysis, including case-control and cohort studies, observed an increased risk of 1.82 (95% CI, 1.65–1.98) associated with a history of endometrial cancer in a first-degree relative, with an estimated cumulative absolute risk of about 3% (95% CI, 2.8%–3.4%).[47] A Dutch multicenter cohort study of women with germline BRCA1 and BRCA2 pathogenic variants concluded that the absolute risk of endometrial cancer was approximately 3%.[48]

This familial risk may result from inherited genetic predisposition and other common factors that exist in families, such as shared culture or learned behaviors.

### References

Dossus L, Allen N, Kaaks R, et al.: Reproductive risk factors and endometrial cancer: the European Prospective Investigation into Cancer and Nutrition. Int J Cancer 127 (2): 442-51, 2010.19924816
Brown SB, Hankinson SE: Endogenous estrogens and the risk of breast, endometrial, and ovarian cancers. Steroids 99 (Pt A): 8-10, 2015.25555473
Haoula Z, Salman M, Atiomo W: Evaluating the association between endometrial cancer and polycystic ovary syndrome. Hum Reprod 27 (5): 1327-31, 2012.22367984
Smith DC, Prentice R, Thompson DJ, et al.: Association of exogenous estrogen and endometrial carcinoma. N Engl J Med 293 (23): 1164-7, 1975.1186789 76051178
Mack TM, Pike MC, Henderson BE, et al.: Estrogens and endometrial cancer in a retirement community. N Engl J Med 294 (23): 1262-7, 1976.177870 76174341
Ziel HK, Finkle WD: Increased risk of endometrial carcinoma among users of conjugated estrogens. N Engl J Med 293 (23): 1167-70, 1975.171569 76051179
Walker AM, Jick H: Cancer of the corpus uteri: increasing incidence in the United States, 1970--1975. Am J Epidemiol 110 (1): 47-51, 1979.463863 79228972
Gray LA, Christopherson WM, Hoover RN: Estrogens and endometrial carcinoma. Obstet Gynecol 49 (4): 385-9, 1977.193072 77171944
McDonald TW, Annegers JF, O'Fallon WM, et al.: Exogenous estrogen and endometrial carcinoma: case-control and incidence study. Am J Obstet Gynecol 127 (6): 572-80, 1977.190887 77131902
Antunes CM, Strolley PD, Rosenshein NB, et al.: Endometrial cancer and estrogen use. Report of a large case-control study. N Engl J Med 300 (1): 9-13, 1979.213722 79053188
Shapiro S, Kelly JP, Rosenberg L, et al.: Risk of localized and widespread endometrial cancer in relation to recent and discontinued use of conjugated estrogens. N Engl J Med 313 (16): 969-72, 1985.2995807 86014238
Austin DF, Roe KM: The decreasing incidence of endometrial cancer: public health implications. Am J Public Health 72 (1): 65-8, 1982.7053625 82088920
Gusberg SB: Precursors of corpus carcinoma estrogens and adenomatous hyperplasia. Am J Obstet Gynecol 54(6): 905-927, 1947.
Gusberg SB: Hormone-dependence of endometrial cancer. Obstet Gynecol 30 (2): 287-93, 1967.5212339 86147758
Bonte J: Medroxyprogesterone in the management of primary and recurrent or metastatic uterine adenocarcinoma. Acta Obstet Gynecol Scand Suppl 19: 21-4, 1972.4508284 73044056
KISTNER RW: Histological effects of progestins on hyperplasia and carcinoma in situ of the endometrium. Cancer 12: 1106-22, 1959 Nov-Dec.14409476
Chlebowski RT, Anderson GL, Sarto GE, et al.: Continuous Combined Estrogen Plus Progestin and Endometrial Cancer: The Women's Health Initiative Randomized Trial. J Natl Cancer Inst 108 (3): , 2016.26668177
Løkkegaard ECL, Mørch LS: Tibolone and risk of gynecological hormone sensitive cancer. Int J Cancer 142 (12): 2435-2440, 2018.29349823
Simin J, Tamimi R, Lagergren J, et al.: Menopausal hormone therapy and cancer risk: An overestimated risk? Eur J Cancer 84: 60-68, 2017.28783542
Killackey MA, Hakes TB, Pierce VK: Endometrial adenocarcinoma in breast cancer patients receiving antiestrogens. Cancer Treat Rep 69 (2): 237-8, 1985.3971394 85124490
Fornander T, Rutqvist LE, Cedermark B, et al.: Adjuvant tamoxifen in early breast cancer: occurrence of new primary cancers. Lancet 1 (8630): 117-20, 1989.2563046 89096133
Rutqvist LE, Mattsson A: Cardiac and thromboembolic morbidity among postmenopausal women with early-stage breast cancer in a randomized trial of adjuvant tamoxifen. The Stockholm Breast Cancer Study Group. J Natl Cancer Inst 85 (17): 1398-406, 1993.8350363 93353542
Andersson M, Storm HH, Mouridsen HT: Incidence of new primary cancers after adjuvant tamoxifen therapy and radiotherapy for early breast cancer. J Natl Cancer Inst 83 (14): 1013-7, 1991.2072407 91303596
Fisher B, Costantino JP, Redmond CK, et al.: Endometrial cancer in tamoxifen-treated breast cancer patients: findings from the National Surgical Adjuvant Breast and Bowel Project (NSABP) B-14. J Natl Cancer Inst 86 (7): 527-37, 1994.8133536 94180408
Fisher B, Costantino JP, Wickerham DL, et al.: Tamoxifen for the prevention of breast cancer: current status of the National Surgical Adjuvant Breast and Bowel Project P-1 study. J Natl Cancer Inst 97 (22): 1652-62, 2005.16288118
Brinton LA, Felix AS, McMeekin DS, et al.: Etiologic heterogeneity in endometrial cancer: evidence from a Gynecologic Oncology Group trial. Gynecol Oncol 129 (2): 277-84, 2013.23485770
Cummings SR, Eckert S, Krueger KA, et al.: The effect of raloxifene on risk of breast cancer in postmenopausal women: results from the MORE randomized trial. Multiple Outcomes of Raloxifene Evaluation. JAMA 281 (23): 2189-97, 1999.10376571 99303064
DeMichele A, Troxel AB, Berlin JA, et al.: Impact of raloxifene or tamoxifen use on endometrial cancer risk: a population-based case-control study. J Clin Oncol 26 (25): 4151-9, 2008.18757329
Enriori CL, Reforzo-Membrives J: Peripheral aromatization as a risk factor for breast and endometrial cancer in postmenopausal women: a review. Gynecol Oncol 17 (1): 1-21, 1984.6319245 84109630
Davidson BJ, Gambone JC, Lagasse LD, et al.: Free estradiol in postmenopausal women with and without endometrial cancer. J Clin Endocrinol Metab 52 (3): 404-8, 1981.7193218 81117641
Troisi R, Potischman N, Hoover RN, et al.: Insulin and endometrial cancer. Am J Epidemiol 146 (6): 476-82, 1997.9290508 97435841
Barry JA, Azizia MM, Hardiman PJ: Risk of endometrial, ovarian and breast cancer in women with polycystic ovary syndrome: a systematic review and meta-analysis. Hum Reprod Update 20 (5): 748-58, 2014 Sep-Oct.24688118
Bergström A, Pisani P, Tenet V, et al.: Overweight as an avoidable cause of cancer in Europe. Int J Cancer 91 (3): 421-30, 2001.11169969 21101244
Swanson CA, Potischman N, Wilbanks GD, et al.: Relation of endometrial cancer risk to past and contemporary body size and body fat distribution. Cancer Epidemiol Biomarkers Prev 2 (4): 321-7, 1993 Jul-Aug.8348055 93350515
Elliott EA, Matanoski GM, Rosenshein NB, et al.: Body fat patterning in women with endometrial cancer. Gynecol Oncol 39 (3): 253-8, 1990.2258066 91078665
Schapira DV, Kumar NB, Lyman GH, et al.: Upper-body fat distribution and endometrial cancer risk. JAMA 266 (13): 1808-11, 1991.1890709 91366750
Olson SH, Trevisan M, Marshall JR, et al.: Body mass index, weight gain, and risk of endometrial cancer. Nutr Cancer 23 (2): 141-9, 1995.7644383 95372235
Weiderpass E, Persson I, Adami HO, et al.: Body size in different periods of life, diabetes mellitus, hypertension, and risk of postmenopausal endometrial cancer (Sweden). Cancer Causes Control 11 (2): 185-92, 2000.10710204 20173438
Le Marchand L, Wilkens LR, Mi MP: Early-age body size, adult weight gain and endometrial cancer risk. Int J Cancer 48 (6): 807-11, 1991.1860727 91317574
Shu XO, Brinton LA, Zheng W, et al.: Relation of obesity and body fat distribution to endometrial cancer in Shanghai, China. Cancer Res 52 (14): 3865-70, 1992.1617661 92315242
Aune D, Navarro Rosenblatt DA, Chan DS, et al.: Anthropometric factors and endometrial cancer risk: a systematic review and dose-response meta-analysis of prospective studies. Ann Oncol 26 (8): 1635-48, 2015.25791635
Keum N, Ju W, Lee DH, et al.: Leisure-time physical activity and endometrial cancer risk: dose-response meta-analysis of epidemiological studies. Int J Cancer 135 (3): 682-94, 2014.24375149
Crosbie EJ, Zwahlen M, Kitchener HC, et al.: Body mass index, hormone replacement therapy, and endometrial cancer risk: a meta-analysis. Cancer Epidemiol Biomarkers Prev 19 (12): 3119-30, 2010.21030602
Esposito K, Chiodini P, Capuano A, et al.: Metabolic syndrome and endometrial cancer: a meta-analysis. Endocrine 45 (1): 28-36, 2014.23640372
Friberg E, Orsini N, Mantzoros CS, et al.: Diabetes mellitus and risk of endometrial cancer: a meta-analysis. Diabetologia 50 (7): 1365-74, 2007.17476474
Luo J, Beresford S, Chen C, et al.: Association between diabetes, diabetes treatment and risk of developing endometrial cancer. Br J Cancer 111 (7): 1432-9, 2014.25051408
Win AK, Reece JC, Ryan S: Family history and risk of endometrial cancer: a systematic review and meta-analysis. Obstet Gynecol 125 (1): 89-98, 2015.25560109
de Jonge MM, de Kroon CD, Jenner DJ, et al.: Endometrial Cancer Risk in Women With Germline BRCA1 or BRCA2 Mutations: Multicenter Cohort Study. J Natl Cancer Inst 113 (9): 1203-1211, 2021.33710348

## Factors With Adequate Evidence for a Decreased Risk of Endometrial Cancer

### Pregnancy and Lactation

Decreased risk of endometrial cancer is associated with parity and lactation, perhaps by inhibiting ovulation. The European Prospective Investigation into Cancer and Nutrition observed a decreased risk associated with parity compared with nulliparous women (hazard ratio [HR], 0.65; 95% confidence interval [CI], 0.54–0.77). The study also observed a trend of decreased risk with increasing number of full-term pregnancies (P < .0001).[1] A pooled analysis of 11 cohort and 19 case-control studies evaluated associations between specific pregnancy outcomes and endometrial cancer.[2] The risk reduction associated with pregnancy was greatest for the first full-term birth (odds ratio [OR], 0.78; 95% CI, 0.72–0.84). Each additional full-term pregnancy was associated with an additional approximately 15% risk reduction up to eight full-term pregnancies (OR, 0.20; 95% CI, 0.14–0.28). Multiple gestation pregnancies did not appear to provide additional benefit beyond that of a singleton birth. Incomplete pregnancies were also associated with a decreased risk of endometrial cancer, with a 7% reduction per episode and an OR of 0.89 (95% CI, 0.84–0.95) for the first incomplete pregnancy. When evaluated by type of incomplete pregnancy, the associated risk reductions for spontaneous abortions (OR, 0.83; 95% CI, 0.76–0.90) and induced abortions (OR, 0.89; 95% CI, 0.79–1.01) were identified.

Data was pooled from 17 studies that participated in the Epidemiology of Endometrial Cancer Consortium. After adjusting for age, parity, use of oral contraception and duration of use, body mass index (BMI), and education level, parous women who reported breast feeding had an 11% reduction in risk of endometrial cancer (pooled OR, 0.89; 95% CI, 0.81–0.98).[3] The risk reduction associated with increasing total duration of breastfeeding was not linear. The greatest reduction in risk occurred after a total duration of breastfeeding of greater than 36 months (adjusted pooled OR, 0.67; 95% CI, 0.53–0.83). However, for individual episodes of breastfeeding, breastfeeding one child beyond 3 months was associated with a 5% reduction in risk (adjusted pooled OR, 0.95; 95% CI, 0.91–0.99).[3]

### Hormonal Contraceptives

Oral contraceptives were first approved by the U.S. Food and Drug Administration in 1960. For many years, they were the mainstay of hormonal contraception. More recently, hormonal contraception has expanded to include combination transdermal patches or vaginal rings, injections, and progestogen-releasing long-acting reversible contraceptives, including single-rod implants and intrauterine systems (IUS).[4]

Oral contraceptive usage confers a long-term reduction in the risk of endometrial cancer. A large population-based study from the United Kingdom prospectively collected information on combined oral contraception use for 46,022 women and followed them for 44 years. In this study, after adjusting for age, parity, smoking, and social class, ever-users of combined estrogen/progesterone oral contraceptive pills had an incidence rate ratio of 0.66 (95% CI, 0.48–0.89) compared with never-users.[5] The benefit of oral contraceptive pill use is associated with duration of use, with increasing benefit reported for women who were obese, current smokers, and those who rarely exercise and who used oral contraceptives for 10 years or more.[6] A meta-analysis combined data from 36 epidemiological studies that included 27,276 women. The study observed a risk reduction of 0.76 (95% CI, 0.73–0.78) for every 5 years of oral contraceptive use. The lower risk persisted for more than 30 years after the last use of oral contraceptives.[5,7] Among women from highly developed countries, 10 years of oral contraceptive use was associated with an absolute risk reduction of endometrial cancer before age 75 years from 2.3 to 1.3 cases per 100 women.[7]

Data suggest that use of levonorgestrel-releasing intrauterine systems (LNG-IUS) is associated with a statistically significant reduction in the risk of developing endometrial cancer. Use of LNG-IUS is an effective treatment for endometrial hyperplasia, which in some cases is a precursor to endometrial cancer and early-stage low-risk endometrial cancer.[8-10] A population-based prospective cohort study in Norway evaluated a cohort of 104,380 women, which included 9,146 women who identified as ever-users of LNG-IUS. The incidence rate of endometrial cancer per 100,000 person-years was 13.9 for ever-users of LNG-IUS (95% CI, 7.8–23.0), compared with 70.0 (95% CI, 65.4–74.9) for never-users. After adjusting for age and menopausal status at the start of follow-up, BMI, physical activity level, use of oral contraceptive pills, and parity, the relative risk (RR) of endometrial cancer was 0.22 (95% CI, 0.13–0.40) for ever-users of LNG-IUS.[11] In an observational nationwide cohort study from Finland, women using LNG-IUS for treatment of menorrhagia from 1994 to 2007 were identified from administrative registers and linked with the Finnish Cancer Registry.[12] In this study, 93,843 users of LNG-IUS were followed for 855,324 women-years at risk. The standardized incidence ratio for endometrial cancer after at least one purchase of LNG-IUS was 0.46 (95% CI, 0.33–0.64; 37 observed cases compared with 80 expected cases). Although not statistically different, the standardized incidence ratio decreased further in women who had purchased two LNG-IUS (0.25; 95% CI, 0.05–0.73; 3 observed cases compared with 12 expected cases). These data represent an attempt to demonstrate a dose effect, as LNG-IUS are considered effective for 5 years.

### Weight Loss

While it is known that obesity is associated with increased endometrial cancer risk, only one study examines the potential benefit of intentional weight loss. In the Iowa Women’s Health Study (IWHS) of 21,707 postmenopausal women,[13] participants completed a self-report questionnaire about intentional weight loss between ages 18 and 39 years, between ages 40 and 54 years, and after age 55 years. Multivariate models adjusting for age, BMI, and BMI^2^ found no association between endometrial cancer incidence and intentional weight loss of at least 20 pounds (RR, 0.93; 95% CI, 0.60–1.44). However, one study included 36,793 women from the Women's Health Initiative (WHI) cohort [14] whose weight was measured at baseline and at 3-year follow-up and was combined with self-reported intentionality of weight loss. The analysis showed an association between intentional weight loss of 10 pounds or more and lower endometrial cancer incidence (multivariable-adjusted RR, 0.61; 95% CI, 0.40–0.92).

Both of these analyses share substantial limitations. Missing covariate data resulted in excluding nearly 25% of participants from each study, and only small percentages of the remaining participants (17% IWHS/8% WHI) were classified into the intentional weight loss category. This resulted in very low numbers of endometrial cancer cases driving the analyses. Both studies used self-report to characterize intentionality of weight loss, which can lead to potential misclassification, although the retrospective nature of the questioning in the IWHS makes the problem more acute in that analysis. Both analyses also adjusted for self-reported physical activity and smoking status, among other covariates. With such small numbers of cases and the potential for residual confounding, the contradictory results of these two analyses suggest that there is scant evidence to conclude that nonsurgical weight loss is protective for endometrial cancer.

Bariatric surgery is associated with more sustained weight loss compared with nonsurgical intentional weight loss.[15] Evidence suggests an association between bariatric surgery and a decreased risk of endometrial cancer.[16-18] In a prospective cohort study from Sweden, 1,420 women with obesity who underwent bariatric surgery and 1,447 matched controls who underwent conventional obesity treatment were followed for a median of 18.1 years.[16] Mean weight loss after bariatric surgery was 21 kilograms at 10 years, compared with almost no change in weight in the usual care cohort. In this study, bariatric surgery was associated with a reduced risk of endometrial cancer (HR, 0.56; 95% CI, 0.35–0.89). Of note, this was not a prespecified study end point or powered to evaluate incidence of cancer. A retrospective cohort study through the Kaiser Permanente health system evaluated 22,198 individuals who had bariatric surgery and 66,427 nonsurgical individuals who were matched on sex, age, study site, BMI, and Elixhauser comorbidity index.[17] More than 80% of the cohort was female. After a mean follow-up time of 3.5 years, there was a 50% reduction in the incidence of endometrial cancer (HR, 0.50; 95% CI, 0.37–0.67) in the cohort who underwent bariatric surgery. A systematic review, which included five observational studies with a control group, reported a decrease in the odds of developing endometrial cancer after bariatric surgery (OR, 0.32; 95% CI, 0.16–0.63).[18] A large retrospective cohort study from England, which followed patients for a median of 3 years in the surgery group and 2.5 years in the no-surgery group, did not find an association with a decreased risk of endometrial cancer after bariatric surgery compared with the control group of patients with obesity.[19] The association of bariatric surgery and decrease in the incidence of endometrial cancer may be caused by secondary effects of weight loss. In one study, women who underwent bariatric surgery had a 35% decrease in blood estradiol levels 1 year after surgery.[20] Bariatric surgery has also been associated with a return to regular menstrual cycles in a high proportion of women with previous menstrual irregularities.[21] The Surgical Procedures and Long-term Effectiveness in Neoplastic Disease Incidence and Death (SPLENDID) study was a retrospective, observational, matched cohort study of patients with obesity who underwent contemporary bariatric surgery (i.e., Roux-en-Y gastric bypass or sleeve gastrectomy) or received usual care (no bariatric surgery).[22] Median follow-up was 6.1 years. The primary end point was the first occurrence of 1 of 13 predefined obesity-associated cancers. Secondary end points included incidence of all types of cancer and cancer-related mortality.[22] In the adjusted Cox models that evaluated incidence of individual cancer types, only endometrial cancer remained significant (adjusted HR, 0.47; 95% CI, 0.27–0.83). There were limitations to this study, which included selection bias and different rates of cancer screening behaviors between the study arms, stemming from the observational nature of the study. In addition, there was the low number of incident cancers and a limited follow-up time.

### Physical Activity

A meta-analysis combined data from prospective studies of recreational activity (nine studies) and occupational activity (five studies) to determine whether activity is associated with endometrial cancer.[23] The highest category of recreational activity was associated with an RR of endometrial cancer of 0.73 (95% CI, 0.58–0.93), compared with lowest category. The RR of endometrial cancer for the highest category of occupational physical activity, based on job classification, was 0.75 (95% CI, 0.68–0.83), compared with the lowest category. Further investigation using the metabolic equivalent of task (MET) and combining data from case-control and cohort studies revealed a decrease in endometrial cancer risk with activity up to 50 MET-hours per week (up to 15 hours/week).[24]

### Smoking

Ever-smokers who smoked at least 20 cigarettes per day have a decreased risk of endometrial cancer, with greatest risk reductions seen in postmenopausal women and in current smokers. This effect has been seen in observational cohort, prospective cohort, and case-control studies and was summarized in a meta-analysis.[25,26] However, such a decrease does not begin to compensate for the many well-documented harms of smoking. These harms are most evident in the increased risk of cardiovascular diseases and other cancers, to the extent that smokers have at least a 10-year decrease in overall life expectancy, compared with nonsmokers.[27]

In contrast, Mendelian randomization analyses have not shown a causal relationship between smoking and decreased endometrial cancer risk in the U.K. Biobank and European Prospective Investigation into Cancer and Nutrition (EPIC) patient cohorts, questioning the strength of this association that was seen in the study's observational analyses.[26]

### References

Dossus L, Allen N, Kaaks R, et al.: Reproductive risk factors and endometrial cancer: the European Prospective Investigation into Cancer and Nutrition. Int J Cancer 127 (2): 442-51, 2010.19924816
Jordan SJ, Na R, Weiderpass E, et al.: Pregnancy outcomes and risk of endometrial cancer: A pooled analysis of individual participant data in the Epidemiology of Endometrial Cancer Consortium. Int J Cancer 148 (9): 2068-2078, 2021.33105052
Jordan SJ, Na R, Johnatty SE, et al.: Breastfeeding and Endometrial Cancer Risk: An Analysis From the Epidemiology of Endometrial Cancer Consortium. Obstet Gynecol 129 (6): 1059-1067, 2017.28486362
Regidor PA: Clinical relevance in present day hormonal contraception. Horm Mol Biol Clin Investig 37 (1): , 2018.30367791
Iversen L, Sivasubramaniam S, Lee AJ, et al.: Lifetime cancer risk and combined oral contraceptives: the Royal College of General Practitioners' Oral Contraception Study. Am J Obstet Gynecol 216 (6): 580.e1-580.e9, 2017.28188769
Michels KA, Pfeiffer RM, Brinton LA, et al.: Modification of the Associations Between Duration of Oral Contraceptive Use and Ovarian, Endometrial, Breast, and Colorectal Cancers. JAMA Oncol 4 (4): 516-521, 2018.29346467
Collaborative Group on Epidemiological Studies on Endometrial Cancer: Endometrial cancer and oral contraceptives: an individual participant meta-analysis of 27 276 women with endometrial cancer from 36 epidemiological studies. Lancet Oncol 16 (9): 1061-70, 2015.26254030
Orbo A, Vereide A, Arnes M, et al.: Levonorgestrel-impregnated intrauterine device as treatment for endometrial hyperplasia: a national multicentre randomised trial. BJOG 121 (4): 477-86, 2014.24286192
Kim MK, Seong SJ, Kim JW, et al.: Management of Endometrial Hyperplasia With a Levonorgestrel-Releasing Intrauterine System: A Korean Gynecologic-Oncology Group Study. Int J Gynecol Cancer 26 (4): 711-5, 2016.26905333
Pal N, Broaddus RR, Urbauer DL, et al.: Treatment of Low-Risk Endometrial Cancer and Complex Atypical Hyperplasia With the Levonorgestrel-Releasing Intrauterine Device. Obstet Gynecol 131 (1): 109-116, 2018.29215513
Jareid M, Thalabard JC, Aarflot M, et al.: Levonorgestrel-releasing intrauterine system use is associated with a decreased risk of ovarian and endometrial cancer, without increased risk of breast cancer. Results from the NOWAC Study. Gynecol Oncol 149 (1): 127-132, 2018.29482839
Soini T, Hurskainen R, Grénman S, et al.: Cancer risk in women using the levonorgestrel-releasing intrauterine system in Finland. Obstet Gynecol 124 (2 Pt 1): 292-9, 2014.25004338
Parker ED, Folsom AR: Intentional weight loss and incidence of obesity-related cancers: the Iowa Women's Health Study. Int J Obes Relat Metab Disord 27 (12): 1447-52, 2003.14634673
Luo J, Chlebowski RT, Hendryx M, et al.: Intentional Weight Loss and Endometrial Cancer Risk. J Clin Oncol 35 (11): 1189-1193, 2017.28165909
Sjöström L, Gummesson A, Sjöström CD, et al.: Effects of bariatric surgery on cancer incidence in obese patients in Sweden (Swedish Obese Subjects Study): a prospective, controlled intervention trial. Lancet Oncol 10 (7): 653-62, 2009.19556163
Anveden Å, Taube M, Peltonen M, et al.: Long-term incidence of female-specific cancer after bariatric surgery or usual care in the Swedish Obese Subjects Study. Gynecol Oncol 145 (2): 224-229, 2017.28259424
Schauer DP, Feigelson HS, Koebnick C, et al.: Bariatric Surgery and the Risk of Cancer in a Large Multisite Cohort. Ann Surg 269 (1): 95-101, 2019.28938270
Winder AA, Kularatna M, MacCormick AD: Does Bariatric Surgery Affect the Incidence of Endometrial Cancer Development? A Systematic Review. Obes Surg 28 (5): 1433-1440, 2018.29512036
Aravani A, Downing A, Thomas JD, et al.: Obesity surgery and risk of colorectal and other obesity-related cancers: An English population-based cohort study. Cancer Epidemiol 53: 99-104, 2018.29414638
Sarwer DB, Spitzer JC, Wadden TA, et al.: Changes in sexual functioning and sex hormone levels in women following bariatric surgery. JAMA Surg 149 (1): 26-33, 2014.24190440
Butterworth J, Deguara J, Borg CM: Bariatric Surgery, Polycystic Ovary Syndrome, and Infertility. J Obes 2016: 1871594, 2016.27965894
Aminian A, Wilson R, Al-Kurd A, et al.: Association of Bariatric Surgery With Cancer Risk and Mortality in Adults With Obesity. JAMA 327 (24): 2423-2433, 2022.35657620
Moore SC, Gierach GL, Schatzkin A, et al.: Physical activity, sedentary behaviours, and the prevention of endometrial cancer. Br J Cancer 103 (7): 933-8, 2010.20877336
Keum N, Ju W, Lee DH, et al.: Leisure-time physical activity and endometrial cancer risk: dose-response meta-analysis of epidemiological studies. Int J Cancer 135 (3): 682-94, 2014.24375149
Zhou B, Yang L, Sun Q, et al.: Cigarette smoking and the risk of endometrial cancer: a meta-analysis. Am J Med 121 (6): 501-508.e3, 2008.18501231
Dimou N, Omiyale W, Biessy C, et al.: Cigarette Smoking and Endometrial Cancer Risk: Observational and Mendelian Randomization Analyses. Cancer Epidemiol Biomarkers Prev 31 (9): 1839-1848, 2022.35900194
Centers for Disease Control and Prevention: Smoking and Tobacco Use. Atlanta, Ga: Centers for Disease Control and Prevention, Office on Smoking and Health, 2015. Available Online (https://www.cdc.gov/tobacco/data_statistics/fact_sheets/fast_facts/index.htm). Last accessed December 18, 2023.

## Interventions With Inadequate Evidence of an Association With Endometrial Cancer

### Fruits, Vegetables, and Vitamins

Studies have not found an association between endometrial cancer and diet, phytoestrogens, soy, and vitamin D.[1-6] Multivitamin use has little or no influence on the risk of common cancers, including endometrial cancer, or on total mortality in postmenopausal women.[7]

### Hair Products, Including Dyes, Bleach, Highlights, Straighteners, and Permanents

One retrospective analysis of the Sister Study addressed a possible association between these hair products and uterine cancers, including endometrial cancers. A limitation to this study was a lack of properly adjusted analysis for multiple comparisons, thus making the significance of the findings hard to interpret.[8]

### References

International Agency for Research On Cancer: IARC Handbooks of Cancer Prevention. Volume 8: Fruit and Vegetables. International Agency for Research On Cancer, 2003.
Bandera EV, Kushi LH, Gifkins DM, et al.: WCRF Systematic Literature Review: The Association Between Food, Nutrition, and Physical Activity and the Risk of Endometrial Cancer and Underlying Mechanisms. World Cancer Research Fund, American Institute for Cancer Research, 2006.
Horn-Ross PL, John EM, Canchola AJ, et al.: Phytoestrogen intake and endometrial cancer risk. J Natl Cancer Inst 95 (15): 1158-64, 2003.12902445
Xu WH, Zheng W, Xiang YB, et al.: Soya food intake and risk of endometrial cancer among Chinese women in Shanghai: population based case-control study. BMJ 328 (7451): 1285, 2004.15136343
Zeleniuch-Jacquotte A, Gallicchio L, Hartmuller V, et al.: Circulating 25-hydroxyvitamin D and risk of endometrial cancer: Cohort Consortium Vitamin D Pooling Project of Rarer Cancers. Am J Epidemiol 172 (1): 36-46, 2010.20562189
Liu JJ, Bertrand KA, Karageorgi S, et al.: Prospective analysis of vitamin D and endometrial cancer risk. Ann Oncol 24 (3): 687-92, 2013.23136228
Neuhouser ML, Wassertheil-Smoller S, Thomson C, et al.: Multivitamin use and risk of cancer and cardiovascular disease in the Women's Health Initiative cohorts. Arch Intern Med 169 (3): 294-304, 2009.19204221
Chang CJ, O'Brien KM, Keil AP, et al.: Use of Straighteners and Other Hair Products and Incident Uterine Cancer. J Natl Cancer Inst 114 (12): 1636-1645, 2022.36245087

## Latest Updates to This Summary (04/10/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Incidence and Mortality

Updated statistics with estimated new cases and deaths for 2025 (cited American Cancer Society as reference 1). Also revised text to state that between 2013 and 2022, death rates for endometrial cancer increased by 1.5% per year.

This summary is written and maintained by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about endometrial cancer prevention. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Screening and Prevention Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Endometrial Cancer Prevention. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/uterine/hp/endometrial-prevention-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389477]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).